# Childhood Intraocular (Uveal) Melanoma Treatment (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the treatment of childhood intraocular (uveal) melanoma. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board.

## General Information About Intraocular Melanoma

Key Points for This Section
- Intraocular melanoma is a disease in which malignant (cancer) cells form in the tissues of the eye.
- Having a fair complexion and certain conditions can affect the risk of melanoma.
- Signs and symptoms of intraocular melanoma include trouble seeing or a dark spot on the iris.
- Tests that examine the eye are used to diagnose intraocular melanoma.
- Certain factors affect prognosis (chance of recovery).

### Intraocular melanoma is a disease in which malignant (cancer) cells form in the tissues of the eye.

Intraocular melanoma begins in the middle of three layers of the wall of the eye. The outer layer includes the white sclera (the "white of the eye") and the clear cornea at the front of the eye. The inner layer has a lining of nerve tissue, called the retina, which senses light and sends images along the optic nerve to the brain. The middle layer, where intraocular melanoma forms, is called the uvea or uveal tract, and has three main parts: the iris, the ciliary body, and the choroid.

Anatomy of the eye, showing the outside and inside of the eye including the sclera, cornea, iris, ciliary body, choroid, retina, vitreous humor, and optic nerve. The vitreous humor is a liquid that fills the center of the eye.

Eye anatomy; two-panel drawing showing the outside and inside of the eye. The top panel shows the outside of the eye, including the eyelid, pupil, sclera, and iris. The bottom panel shows the inside of the eye, including the cornea, lens, ciliary body, retina, choroid, optic nerve, and vitreous humor.

### Having a fair complexion and certain conditions can affect the risk of melanoma.

Anything that increases your risk of getting a disease is called a risk factor. Having a risk factor does not mean that you will get cancer; not having risk factors doesn’t mean that you will not get cancer. Talk with your child's doctor if you think your child may be at risk.

Risk factors for childhood intraocular melanoma include the following:

- Light eye color.
- Fair skin color.
- Not being able to tan.
- Oculodermal melanocytosis.
- Cutaneous nevi.

### Signs and symptoms of intraocular melanoma include trouble seeing or a dark spot on the iris.

These and other signs and symptoms may be caused by intraocular melanoma or by other conditions.

Check with your child's doctor if your child has any of the following:

- Trouble seeing.
- Dark spot on the iris (colored part of the eye).
- A bulging eye.

### Tests that examine the eye are used to diagnose intraocular melanoma.

The following tests and procedures may be used:

- Physical exam and health history: An exam of the body to check general signs of health, including checking for signs of disease, such as lumps or anything else that seems unusual. A history of the patient’s health habits and past illnesses and treatments will also be taken.
- Ultrasound: A procedure in which high-energy sound waves (ultrasound) are bounced off internal tissues or organs and make echoes. The echoes form a picture of body tissues called a sonogram. The picture can be printed to be looked at later.
- Fluorescein angiography: A test used to take pictures of the retina in the eye. A yellow dye is injected into a vein and travels throughout the body including the blood vessels in the eye. The yellow dye causes the vessels in the eye to fluoresce when a picture is taken.

### Certain factors affect prognosis (chance of recovery).

Prognosis depends on the following:

- The size of the tumor.
- The child's age.
- Whether the tumor is in the ciliary body.
- Whether the tumor is outside the sclera.
- Whether the tumor has spread within the eye or to other places in the body.
- Whether there are certain changes in the genes linked to intraocular melanoma.

## Stages of Childhood Intraocular Melanoma

Key Points for This Section
- After intraocular melanoma has been diagnosed, tests are done to find out if cancer cells have spread within the eye or to other parts of the body.
- There are three ways cancer spreads in the body.
- Cancer may spread from where it began to other parts of the body.
- Sometimes intraocular melanoma comes back after treatment.

### After intraocular melanoma has been diagnosed, tests are done to find out if cancer cells have spread within the eye or to other parts of the body.

The process used to find out if cancer has spread to areas near the eye or to other parts of the body is called staging. There is no standard staging system for childhood intraocular melanoma.

The tests and procedures used to diagnose cancer and other tests and procedures may be used to find out if cancer has spread and plan treatment:

- Liver function tests: A procedure in which a blood sample is checked to measure the amounts of certain substances released into the blood by the liver. A higher than normal amount of a substance can be a sign that cancer has spread to the liver.
- CT scan (CAT scan): A procedure that makes a series of detailed pictures of areas inside the body, such as the chest or liver, taken from different angles. The pictures are made by a computer linked to an x-ray machine. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography.
  Computed tomography (CT) scan. The child lies on a table that slides through the CT scanner, which takes a series of detailed x-ray pictures of areas inside the body.
  Computed tomography (CT) scan; drawing shows a child lying on a table that slides through the CT scanner, which takes a series of detailed x-ray pictures of areas inside the body.
- MRI: A procedure that uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the body, such as the liver. This procedure is also called nuclear magnetic resonance imaging (NMRI).
  Magnetic resonance imaging (MRI) scan. The child lies on a table that slides into the MRI machine, which takes a series of detailed pictures of areas inside the body. The positioning of the child on the table depends on the part of the body being imaged.
  Magnetic resonance imaging (MRI) scan; drawing shows a child lying on a table that slides into the MRI machine, which takes a series of detailed pictures of areas inside the body.
- Chest x-ray: An x-ray of the chest. An x-ray is a type of energy beam that can go through the body and onto film, making a picture of areas inside the body.

### There are three ways cancer spreads in the body.

Cancer can spread through tissue, the lymph system, and the blood:

- Tissue. The cancer spreads from where it began by growing into nearby areas.
- Lymph system. The cancer spreads from where it began by getting into the lymph system. The cancer travels through the lymph vessels to other parts of the body.
- Blood. The cancer spreads from where it began by getting into the blood. The cancer travels through the blood vessels to other parts of the body.

### Cancer may spread from where it began to other parts of the body.

When cancer spreads to another part of the body, it is called metastasis. Cancer cells break away from where they began (the primary tumor) and travel through the lymph system or blood.

- Lymph system. The cancer gets into the lymph system, travels through the lymph vessels, and forms a tumor (metastatic tumor) in another part of the body.
- Blood. The cancer gets into the blood, travels through the blood vessels, and forms a tumor (metastatic tumor) in another part of the body.

The metastatic tumor is the same type of cancer as the primary tumor. For example, if intraocular melanoma spreads to the liver, the cancer cells in the liver are actually intraocular melanoma cells. The disease is metastatic intraocular melanoma, not liver cancer.

metastasis: how cancer spreads

Many cancer deaths are caused when cancer moves from the original tumor and spreads to other tissues and organs. This is called metastatic cancer. This animation shows how cancer cells travel from the place in the body where they first formed to other parts of the body.

YouTube (https://www.youtube.com/watch?v=fQwar_-QdiQ)

### Sometimes intraocular melanoma comes back after treatment.

The cancer may come back in the eye or in other parts of the body, such as in the lung or liver.

## Treatment Option Overview

Key Points for This Section
- There are different types of treatment for children with intraocular melanoma.
- Children with intraocular melanoma should have their treatment planned by a team of doctors who are experts in treating childhood cancer.
- Three types of standard treatment are used:
  - Surgery
  - Radiation therapy
  - Laser surgery
- New types of treatment are being tested in clinical trials.
- Treatment for childhood intraocular melanoma may cause side effects.
- Patients may want to think about taking part in a clinical trial.
- Patients can enter clinical trials before, during, or after starting their cancer treatment.
- Follow-up tests may be needed.

### There are different types of treatment for children with intraocular melanoma.

Some treatments are standard (the currently used treatment), and some are being tested in clinical trials. A treatment clinical trial is a research study meant to help improve current treatments or obtain information on new treatments for patients with cancer. When clinical trials show that a new treatment is better than the standard treatment, the new treatment may become the standard treatment.

Because cancer in children is rare, taking part in a clinical trial should be considered. Some clinical trials are open only to patients who have not started treatment.

### Children with intraocular melanoma should have their treatment planned by a team of doctors who are experts in treating childhood cancer.

Treatment will be overseen by a pediatric oncologist, a doctor who specializes in treating children with cancer. The pediatric oncologist works with other pediatric health professionals who are experts in treating children with cancer and who specialize in certain areas of medicine. This may include the following specialists and others:

- Pediatrician.
- Pediatric surgeon.
- Radiation oncologist.
- Pediatric ophthalmologist.
- Social worker.
- Rehabilitation specialist.
- Psychologist.
- Child-life specialist.

### Three types of standard treatment are used:

#### Surgery

During surgery, all or part of the eye with cancer is removed. Whether all or part of the eye is removed during surgery depends on the size of the cancer and where it is in the eye.

#### Radiation therapy

Radiation therapy is a cancer treatment that uses high-energy x-rays or other types of radiation to kill cancer cells or keep them from growing. There are two types of radiation therapy:

- External radiation therapy uses a machine outside the body to send radiation toward the area of the body with cancer.
- Internal radiation therapy uses a radioactive substance sealed in needles, seeds, wires, or catheters that are placed directly into or near the cancer. For intraocular melanoma, localized plaque radiation therapy is used. Radioactive seeds are attached to one side of a disk, called a plaque, and placed directly on the outside wall of the eye near the tumor. The side of the plaque with the seeds on it faces the eyeball, aiming radiation at the tumor. The plaque helps protect other nearby tissue from the radiation.
  Plaque radiotherapy is a type of radiation therapy used to treat eye cancer. Radioactive seeds are attached to one side of a thin piece of metal (usually gold) called a plaque. The plaque is sewn onto the outside wall of the eye near the tumor. The seeds give off radiation which kills the cancer. The plaque is removed at the end of treatment, which usually lasts for several days.
  Drawing of a cross-section of the eye showing the sclera, choroid, retina, and optic nerve. An inset shows a plaque with radioactive seeds that is placed on the outside of the eye. The seeds are aimed at the cancer.

#### Laser surgery

Laser surgery uses a laser beam (a narrow beam of intense light) to turn the cancer cells into a gas that evaporates (dissolves into the air).

### New types of treatment are being tested in clinical trials.

This summary section describes treatments that are being studied in clinical trials. It may not mention every new treatment being studied. Information about clinical trials is available from the NCI website (https://www.cancer.gov/research/participate/clinical-trials).

#### Targeted therapy

Targeted therapy is a type of treatment that uses drugs or other substances to identify and attack specific cancer cells. Targeted therapies usually cause less harm to normal cells than chemotherapy or radiation therapy do.

Targeted therapy is being studied for the treatment of childhood intraocular melanoma that has recurred (come back).

### Treatment for childhood intraocular melanoma may cause side effects.

To learn more about side effects that begin during treatment for cancer, visit Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects).

### Patients may want to think about taking part in a clinical trial.

For some patients, taking part in a clinical trial may be the best treatment choice. Clinical trials are part of the cancer research process. Clinical trials are done to find out if new cancer treatments are safe and effective or better than the standard treatment.

Many of today's standard treatments for cancer are based on earlier clinical trials. Patients who take part in a clinical trial may receive the standard treatment or be among the first to receive a new treatment.

Patients who take part in clinical trials also help improve the way cancer will be treated in the future. Even when clinical trials do not lead to effective new treatments, they often answer important questions and help move research forward.

### Patients can enter clinical trials before, during, or after starting their cancer treatment.

Some clinical trials only include patients who have not yet received treatment. Other trials test treatments for patients whose cancer has not gotten better. There are also clinical trials that test new ways to stop cancer from recurring (coming back) or reduce the side effects of cancer treatment.

Clinical trials are taking place in many parts of the country. Information about clinical trials supported by NCI can be found on NCI’s clinical trials search (https://www.cancer.gov/research/participate/clinical-trials-search) webpage. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

### Follow-up tests may be needed.

As your child goes through treatment, they will have follow-up tests or check-ups. Some tests that were done to diagnose or stage the cancer may be repeated to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests.

Some of the tests will continue to be done from time to time after treatment has ended. The results of these tests can show if your child's condition has changed or if the cancer has recurred (come back).

## Treatment of Childhood Intraocular Melanoma

For information about the treatments listed below, see the Treatment Option Overview section.

Treatment of newly diagnosed intraocular melanoma in children is like treatment for adults and may include the following:

- Surgery to remove the tumor.
- Radiation therapy.
- Laser surgery.

See the PDQ summary on adult Intraocular (Uveal) Melanoma Treatment for more information.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Recurrent Childhood Intraocular Melanoma

For information about the treatments listed below, see the Treatment Option Overview section.

Treatment of recurrent intraocular melanoma in children may include the following:

- A clinical trial that checks a sample of the patient's tumor for certain gene changes. The type of targeted therapy that will be given to the patient depends on the type of gene change.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## To Learn More About Childhood Intraocular Melanoma

For more information from the National Cancer Institute about intraocular melanoma, see the following:

- Intraocular (Eye) Melanoma Home Page (https://www.cancer.gov/types/eye)
- Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet)
- Targeted Cancer Therapies (https://www.cancer.gov/about-cancer/treatment/types/targeted-therapies)
- Lasers to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/surgery/lasers)

For more childhood cancer information and other general cancer resources, visit:

- About Cancer (https://www.cancer.gov/about-cancer)
- Childhood Cancers (https://www.cancer.gov/types/childhood-cancers)
- CureSearch for Children's Cancer (http://www.curesearch.org/)
- Late Effects of Treatment for Childhood Cancer
- Adolescents and Young Adults with Cancer (https://www.cancer.gov/types/aya)
- Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents)
- Cancer in Children and Adolescents (https://www.cancer.gov/types/childhood-cancers/child-adolescent-cancers-fact-sheet)
- Cancer Staging (https://www.cancer.gov/about-cancer/diagnosis-staging/staging)
- Coping with Cancer (https://www.cancer.gov/about-cancer/coping)
- Questions to Ask Your Doctor about Cancer (https://www.cancer.gov/about-cancer/coping/questions)
- For Survivors, Caregivers, and Advocates (https://cancercontrol.cancer.gov/ocs/resources/survivors.html)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the treatment of childhood intraocular (uveal) melanoma. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Pediatric Treatment Editorial Board. PDQ Childhood Intraocular (Uveal) Melanoma Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/eye/patient/child-intraocular-melanoma-treatment-pdq. Accessed <MM/DD/YYYY>.

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).